# Hot Flashes and Night Sweats (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the causes and treatment of hot flashes and night sweats. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## Causes of Hot Flashes and Night Sweats in People with Cancer and Survivors

Key Points for This Section
- Hot flashes and night sweats are common in people with cancer and survivors.
- In women and men, hot flashes and night sweats may be caused by surgery, radiation therapy, and taking certain medications.
  - Women
  - Men

### Hot flashes and night sweats are common in people with cancer and survivors.

A hot flash is a sudden warm feeling over your face, neck, and chest that may cause you to sweat and your face to turn red. Sweating is your body's way of lowering body temperature by causing heat loss through your skin. Hot flashes combined with sweats that happen while sleeping are often called night sweats or hot flushes. Hot flashes and night sweats are common in people receiving cancer treatment. Some people continue to have hot flashes and night sweats after cancer treatment.

### In women and men, hot flashes and night sweats may be caused by surgery, radiation therapy, and taking certain medications.

#### Women

Menopause occurs when the ovaries stop making estrogen. Hot flashes and night sweats are common symptoms of menopause. Early menopause is a condition in which the ovaries stop making estrogen at a younger age than usual. Early menopause can occur when both ovaries are removed by surgery, such as a bilateral oophorectomy to lessen the chance cancer will occur or as part of a hysterectomy to treat cancer.

Other treatments that can cause hot flashes and night sweats include:

- Chemotherapy.
- Hormone therapy, such as antiestrogens (tamoxifen) and aromatase inhibitors.
- Radiation therapy.
- Other drug therapy, such as opioids, tricyclic antidepressants, and steroids.

In people with breast cancer, severe hot flashes have been linked with:

- Sleeping problems.
- A lot of pain.
- Poor mental health.

In premenopausal breast cancer survivors, hot flashes and night sweats have also been linked with depression.

#### Men

In men, the testes produce testosterone. Surgery to remove one or both testicles for the treatment of prostate cancer can trigger a set of symptoms that include hot flashes and night sweats. Hormone therapy with gonadotropin-releasing hormone or estrogen also causes these symptoms in men.

Other drug therapy, such as opioids, tricyclic antidepressants, and steroids, may also cause hot flashes and night sweats.

## Drug Treatment for Hot Flashes and Night Sweats in People with Cancer and Survivors

Key Points for This Section
- Hot flashes and night sweats may be controlled with estrogen replacement therapy.
- Other drugs may be useful in some people.
- Side effects from drug therapy for hot flashes and night sweats may develop.

### Hot flashes and night sweats may be controlled with estrogen replacement therapy.

Hot flashes and night sweats during natural or treatment-related menopause can be controlled with estrogen replacement therapy. However, many women are not able to take estrogen replacement (for example, women who have or had breast cancer) and may need to take a drug that does not have estrogen in it. Hormone replacement therapy that combines estrogen with progestin may increase the risk of breast cancer or breast cancer recurrence.

Treatment of hot flashes in men who have been treated for prostate cancer may include estrogens, progestin, antidepressants, and anticonvulsants.

### Other drugs may be useful in some people.

Studies of non-estrogen drugs to treat hot flashes in women with a history of breast cancer have reported that many of them do not work as well as estrogen replacement or have side effects. Megestrol and medroxyprogesterone (drugs like progesterone), certain antidepressants, anticonvulsants, and clonidine (a drug used to treat high blood pressure) are non-estrogen drugs used to control hot flashes.

### Side effects from drug therapy for hot flashes and night sweats may develop.

Side effects of non-hormonal drug therapy may include:

- Antidepressants used to treat hot flashes over a short period of time may cause nausea, fatigue, dry mouth, and changes in appetite. Some antidepressants may change how other drugs, such as tamoxifen, work in the body.
- Anticonvulsants used to treat hot flashes may cause fatigue, dizziness, and trouble concentrating.
- Clonidine may cause dry mouth, fatigue, constipation, and insomnia.

Side effects from drug therapy may vary from person to person, so treatment and dose will be specific to your needs. If one medicine does not improve your symptoms, switching to another medicine may help.

## Non-Drug Treatment for Hot Flashes and Night Sweats in People with Cancer and Survivors

Key Points for This Section
- Treatments that help people cope with stress and anxiety may help manage hot flashes.
- Comfort measures may help relieve hot flashes and night sweats.
- Herbs and dietary supplements should be used with caution.
- Acupuncture has been studied in the treatment of hot flashes.

### Treatments that help people cope with stress and anxiety may help manage hot flashes.

Treatments that change how you deal with stress, anxiety, and negative feelings may help you manage hot flashes. These strategies include cognitive behavioral therapy and relaxation techniques. They help you gain a sense of control and develop coping skills to manage your symptoms.

Hypnosis has also been used as a treatment for hot flashes. It is a trance-like state that allows you to be more aware, focused, relaxed, and open to suggestion. Under hypnosis, you can concentrate more clearly on a specific thought or feeling without becoming distracted. A therapist helps you to deeply relax and focus on cooling thoughts. This may lower stress levels, balance body temperature, and calm the heart rate and breathing rate.

Cognitive behavioral therapy, relaxation techniques, or hypnosis may help hot flashes and related problems when used together with drug therapy.

### Comfort measures may help relieve hot flashes and night sweats.

Comfort measures may be used to treat hot flashes and night sweats related to cancer treatment. Since body temperature goes up before a hot flash, doing the following may control body temperature and help control symptoms:

- Wear loose-fitting clothes made of cotton.
- Use fans and open windows to keep air moving.
- Practice relaxation techniques.

### Herbs and dietary supplements should be used with caution.

It is important that your health care providers know about all of the dietary supplements, such as soy and herbs, you are taking with your medicines.

Studies of vitamin E for the relief of hot flashes show that it is only slightly better than a placebo (pill or procedure that has no effect). Most studies of soy and black cohosh show they are no better than a placebo in reducing hot flashes. Soy is rich in estrogen-like substances, but how it affects cells in the body is unknown. Studies of ground flaxseed and magnesium oxide to treat hot flashes have shown mixed results.

Claims are made about several other plant-based and natural products as remedies for hot flashes. These include dong quai, milk thistle, red clover, licorice root extract, and chaste tree berry. Since little is known about how these products work or whether they affect the risk of breast cancer, you should talk with your doctor before using them.

### Acupuncture has been studied in the treatment of hot flashes.

Pilot studies of acupuncture and randomized clinical trials that compare true acupuncture and sham (placebo) treatment have been done in people with hot flashes and results are mixed. A review of many studies combined showed that acupuncture had slight or no effects in people with breast cancer who had hot flashes. In contrast, a randomized clinical trial that was not included in the review showed that people with breast cancer who were given acupuncture had fewer hot flashes. Another randomized clinical trial showed that breast cancer survivors who were given electroacupuncture had a reduction in hot flash symptoms. To learn more, visit the Vasomotor symptoms section in the health professional version of Acupuncture.

## Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the causes and treatment of hot flashes and night sweats. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Hot Flashes and Night Sweats. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/hot-flashes-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389162]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).